# Liver (Hepatocellular) Cancer Prevention (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about liver (hepatocellular) cancer prevention. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

Note: The Overview section summarizes the published evidence on this topic. The rest of the summary describes the evidence in more detail.

Other PDQ summaries containing information related to liver (hepatocellular) cancer prevention include the following:

- Liver (Hepatocellular) Cancer Screening
- Primary Liver Cancer Treatment
- Childhood Liver Cancer Treatment
- Levels of Evidence for Cancer Screening and Prevention Studies

### Who Is at Risk?

The critical etiological agent in at least 80% of hepatocellular cancer (HCC) cases worldwide is chronic hepatitis B virus (HBV) infection or chronic hepatitis C virus (HCV) infection.[1] Both viruses, either alone or with other risk factors, are responsible for staggering increases in the risk of HCC, relative to the absence of these hepatitis viruses. Men with chronic HBV or HCV infection are more likely to develop HCC than are women with the same chronic infection, with some, but not the entire difference explained by varying prevalence of other risk factors.[2] Cirrhosis, regardless of its etiology, predisposes patients to HCC [3] and is present in 70% to 90% of HCC patients at the time of diagnosis.[4] Heavy alcohol use is a strong etiologic agent for HCC because it can cause cirrhosis and the presence of HBV or HCV increases risk even more.[5] Exposure to aflatoxin B1 strongly increases HCC risk in individuals with chronic HBV infection and may do so, but to a much lesser extent, in individuals without chronic HBV infection.[1] Nonalcoholic steatohepatitis (NASH) increases risk of HCC among patients who have accompanying cirrhosis [6] and may modestly increase risk in patients without cirrhosis.[7,8] Cigarette smoking modestly increases the risk.[9] Untreated hereditary hemochromatosis and certain other rare medical and genetic conditions are responsible for large increases in HCC risk but are responsible for only a small percentage of cases.[1] The future HCC incidence among patients newly diagnosed with nonalcoholic fatty liver (NAFL) is not known, and because NAFL can progress to NASH, and patients with NAFL can develop cirrhosis, there is reason to believe that patients with NAFL are at elevated risk.[10] A diagnosis of metabolic syndrome (MetS) is associated with an increased risk of HCC,[11] as are obesity and type 2 diabetes, which are common component conditions of MetS.[11] Those three conditions also can occur concurrently with NAFL.[12] The frequent coexistence of these four conditions makes the interpretation of condition-specific risk measures difficult. Decreases in HCC incidence rates have occurred after implementation of HBV vaccination programs,[13] and treatment with nucleos(t)ide analogue therapy reduces but does not eliminate the risk of HCC in patients with chronic HBV infection.[14] Replacement of a food supply that was heavily contaminated with aflatoxin B1 with one that contained much lower levels resulted in a more than 50% reduction in primary liver cancer.[15] HCV treatment with direct-acting antivirals that results in sustained virological response may reduce HCC risk.[16]

### Factors With Adequate Evidence of Increased Risk of Hepatocellular Cancer (HCC)

#### Chronic hepatitis B virus (HBV) infection

Based on solid evidence, chronic HBV infection causes HCC.

Magnitude of Effect: Chronic HBV infection is the leading cause of HCC in Asia and Africa.[17] HBV, either alone or in the presence of other risk factors, is responsible for large increases in the risk of developing HCC. Although the degree of increase in risk varies by other factors or characteristics of infection, it is reasonable to assume that, on average, relative risks (RRs) of HBV are at least fivefold.[2]

- Study Design: Prospective cohort studies; case-control studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Chronic hepatitis C virus (HCV) infection

Based on solid evidence, chronic HCV infection causes HCC.

Magnitude of Effect: HCV infection is the leading cause of HCC in North America, Europe, and Japan.[17] HCV, either alone or in the presence of other risk factors, is responsible for staggering increases in the risk of developing HCC. Although degree of increase in risk varies by the presence of other factors or characteristics of infection, it is reasonable to assume that, on average, relative risks of HCV are at least 15-fold.[18]

- Study Design: Prospective cohort studies; case-control studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Cirrhosis

Based on solid evidence, cirrhosis, regardless of its etiology, predisposes patients to HCC.[3] HCC develops in the presence of a cirrhotic liver in most instances.[3]

Magnitude of Effect: In autopsy studies, 80% to 90% of individuals who die of HCC have cirrhotic livers.[3] The risk of HCC varies by cause of cirrhosis; patients with HCV-related cirrhosis are at greater risk than those with HBV-related cirrhosis, and those with HBV-related cirrhosis are at greater risk than those with alcohol-related cirrhosis.[17,18] The 5-year cumulative risk of developing HCC for patients with cirrhosis ranges between 5% and 30%.[18]

- Study Design: Autopsy studies, prospective cohort studies, case-control studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Heavy alcohol use

Based on solid evidence, heavy alcohol use increases HCC risk.[2] Heavy alcohol use causes cirrhosis, and the development of most alcohol-related HCC is thought to occur via that pathway.[3] However, heavy alcohol users who do not develop cirrhosis are also at elevated risk of developing HCC.[3]

Magnitude of Effect: Heavy alcohol consumption increases HCC risk at least twofold; some studies suggest at least a fivefold increase.[17] Among individuals with HBV or HCV infection, the magnitude of the association is about the same.[19] However, heavy alcohol consumption and chronic HCV infection appear to act synergistically on HCC risk, resulting in perhaps a 100-fold increase in risk relative to individuals who are not infected and not heavy consumers of alcohol. The existence of a synergistic effect with HBV is less consistent, although one study observed a 50-fold increase in risk.[19]

- Study Design: Case-control study, case series, cohort studies.
- Internal Validity: Fair.
- Consistency: Good.
- External Validity: Good.

#### Aflatoxin B1

Aflatoxin B1 is a mycotoxin that can contaminate corn and peanuts stored in warm, humid environments.[1] Based on solid evidence, aflatoxin B1 exposure increases HCC risk.[18]

Magnitude of Effect: In individuals with chronic HBV infection, aflatoxin B1 exposure is estimated to increase risk 60-fold.[18] Because chronic HBV infection is highly prevalent in areas where exposure to aflatoxin B1 is an environmental concern, it is difficult to assess the magnitude of effect in individuals without HBV, although the available limited data suggest that the increase in risk may be fourfold.[20]

- Study Design: Ecological studies, prospective cohort studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Nonalcoholic steatohepatitis (NASH)

Based on fair evidence, NASH increases risk of HCC.

Magnitude of Effect: In a study of 195 patients with NASH and cirrhosis, 13% were diagnosed with HCC after a median follow-up of 3.2 years.[6] In patients with NASH without cirrhosis, HCC occurs infrequently; however, these patients are thought to have a modestly elevated risk of HCC.[7,8]

- Study Design: Prospective cohort studies, medical record abstraction, case series.
- Internal Validity: Fair.
- Consistency: Good.
- External Validity: Fair.

#### Cigarette smoking

Based on fair evidence, cigarette smoking increases HCC risk.

Magnitude of Effect: Cigarette smoking in the absence of viral infection is associated with a modest (up to twofold) increase in HCC risk. Cigarette smoking and presence of chronic HBV or HCV infection results in at least an additive effect on HCC risk.[9]

- Study Design: Case-control and cohort studies.
- Internal Validity: Fair.
- Consistency: Fair.
- External Validity: Fair.

#### Certain rare genetic and medical conditions (untreated hereditary hemochromatosis [HH], alpha-1-antitrypsin deficiency, glycogen storage disease, porphyria cutanea tarda, and Wilson disease)

Based on solid evidence, untreated HH, alpha-1-antitrypsin deficiency (AAT), glycogen storage disease, porphyria cutanea tarda, and Wilson disease increase the risk of HCC, but account for few cases.[1] In the absence of treatment, HH leads to cirrhosis, although there are reports of HCC developing in patients with noncirrhotic livers.[1]

Magnitude of Effect: Untreated HH confers at least a 20-fold increase in risk,[17] although risk varies according to other factors (including HBV and HCV infection). Treatment to reduce iron stores can greatly reduce risk. AAT deficiency, glycogen storage disease, porphyria cutanea tarda, and Wilson disease confer large but varied increases in risk of HCC.[1]

- Study Design: Prospective cohort studies (HH), case series (other conditions).
- Internal Validity: Fair (HCC), not applicable (N/A; other conditions).
- Consistency: Fair (HCC), good (other conditions).
- External Validity: Fair (HCC), N/A (other conditions).

### Factors With Inadequate Evidence of Increased Risk of HCC

#### Nonalcoholic fatty liver

Based on limited evidence, some patients with NAFL will develop NASH or cirrhosis.[10] Therefore, NAFL is assumed to increase HCC risk.

Magnitude of Effect: A small clinical study suggested that between 20% and 50% of NAFL patients may develop NASH.[10] Up to 4% of NAFL patients may develop cirrhosis.[21] The observation that NAFL patients have developed these conditions, which are known to increase HCC risk, leads to the conclusion that NAFL increases HCC risk, even though the future incidence of HCC among patients newly diagnosed with NAFL is not known.

- Study Design: Biopsy studies, case series.
- Internal Validity: Poor.
- Consistency: N/A.
- External Validity: N/A.

#### Metabolic syndrome (MetS)

Based on fair evidence, a diagnosis of MetS is associated with an increased risk of HCC.[22]

Magnitude of Effect: A meta-analysis of more than 7,000 HCC cases from four studies produced a risk ratio of 1.8 (95% confidence interval [CI], 1.37–2.40) for a diagnosis of MetS. The combined risk ratios were varied (range, 1.2 [95% CI, 0.55–2.53] to 3.7 [95% CI, 1.78–7.58]).[23]

- Study Design: Case-control studies and cohort studies.
- Internal Validity: Fair.
- Consistency: Good.
- External Validity: Good.

#### Obesity

Based on fair evidence, obesity is associated with an increase in HCC risk.

Magnitude of Effect: Numerous large epidemiological studies suggest about a twofold increase in HCC risk for individuals who are obese.[11]

- Study Design: Case-control studies, retrospective and prospective cohort studies.
- Internal Validity: Fair.
- Consistency: Good.
- External Validity: Good.

#### Type 2 diabetes

Based on fair evidence, type 2 diabetes is associated with an increase in HCC risk.

Magnitude of Effect: Numerous large epidemiological studies suggest a twofold to fourfold increase in HCC risk for individuals with type 2 diabetes.[11]

- Study Design: Case-control studies, retrospective and prospective cohort studies.
- Internal Validity: Fair.
- Consistency: Good.
- External Validity: Good.

### Interventions With Adequate Evidence of Decreased Risk of HCC

#### HBV vaccination

Based on solid evidence, neonatal HBV vaccination or catch-up vaccination at young ages reduces HCC incidence in young adults.[24]

Magnitude of Effect: Reductions in pediatric and young adult HCC risk of at least 50% have been observed in cohorts immunized at birth or during early childhood. It is predicted that universal neonate immunization will ultimately eliminate 70% to 85% of global HCC cases.[24,25]

- Study Design: Cluster randomized controlled trial (RCT), historical trends, mathematical modeling.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Treatment for chronic HBV infection

Based on solid evidence, chronic HBV treatment with nucleos(t)ide analogue therapy reduces the risk of HCC.[14]

Magnitude of Effect: About a 50% reduction in incidence.

- Study Design: Meta-analysis of clinical trials (some randomized, some blinded), retrospective cohort studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

#### Availability of food not contaminated with aflatoxin B1

Based on solid evidence, replacement of food highly contaminated with aflatoxin B1 with food that harbors much lower levels of aflatoxin B1 leads to a reduction in liver cancer mortality.[15]

Magnitude of Effect: A more-than-50% reduction in liver cancer mortality.

- Study Design: Historical trends.
- Internal Validity: Good.
- Consistency: N/A.
- External Validity: N/A.

### Interventions With Inadequate Evidence of Decreased Risk of HCC

#### HCV treatment with direct-acting antivirals (DAAs)

Based on fair evidence, HCV treatment with DAAs that results in sustained virological response (SVR) may reduce HCC risk.

Magnitude of Effect: Patients treated with DAAs who attained SVR had an approximately 75% reduction in HCC risk relative to those who did not attain SVR.[16] Reduction in relative risk with SVR was similar in patients with cirrhosis (hazard ratio [HR], 0.31; 95% CI, 0.23–0.44) and patients without cirrhosis (HR, 0.18; 95% CI, 0.11–0.30). There does not appear to be an increased risk of HCC among individuals, with or without cirrhosis, who received DAAs as opposed to those who received interferon.[26,27]

- Study Design: Retrospective cohort, case series.
- Internal Validity: Fair.
- Consistency: Fair.
- External Validity: Fair.

#### Statin use among adults with HBV or HCV

Based on fair evidence, statin use may be associated with a reduced risk of developing HCC in patients with HBV or HCV infection.[28] Statin use may be associated with a reduced risk of developing HCC in all adults.

Magnitude of Effect: Relative reductions in HCC risk in adults with HBV or HCV infection of approximately 50% was found in a systematic review of observational studies (kappa statistic, 13). A statistically significant effect was observed with lipophilic statin use (HR, 0.52; P < .001; kappa statistic, 2) but not with hydrophilic statin use (RR, 0.89; P = .21; kappa statistic, 2) (P for subgroup difference < .001).[28] However, there was moderate heterogeneity in the two studies that reported on hydrophilic statin use, with one study [29,30] showing a 49% statistically significant relative reduction and the other study [31,32] showing a nonsignificant 5% relative reduction.

- Study Design: Systematic review and meta-analysis of observational study.
- Internal Validity: Good.
- Consistency: Good across patient characteristics, including possibly HBV/HCV status but possibly inconsistent for the type of statin use (lipophilic vs. hydrophilic).
- External Validity: Unclear. A systematic review and meta-analysis of observational and randomized studies in adults with and without HBV/HCV infection (kappa statistic, 10) reported that statin use was associated with a 37% relative reduction in developing HCC (odds ratio [OR], 0.63; 95% CI, 0.52–0.76). Five studies did not report the baseline prevalence of HBV/HCV in individuals; one study noted that 100% of individuals had HBV infection, another study noted that HBV/HCV was present in 23.9%/25.1% at baseline while another study noted 1.9%/14.7%, respectively. Two other studies reported that HBV/HCV was present in less than 10% of the population. In sensitivity analyses, the association between statin use and HCC was observed in observational studies (kappa statistic, 7; adjusted OR, 0.60; 95% CI, 0.49–0.73) but not in RCTs (kappa statistic, 3; OR, 0.95; 95% CI, 0.62–1.45 [although CIs were wide]).[33]

### References

London WT, McGlynn K: Liver cancer. In: Schottenfeld D, Fraumeni JF Jr, eds.: Cancer Epidemiology and Prevention. 3rd ed. Oxford University Press, 2006, pp 763-86.
El-Serag HB, Kanwal F: Epidemiology of hepatocellular carcinoma in the United States: where are we? Where do we go? Hepatology 60 (5): 1767-75, 2014.24839253
Fattovich G, Stroffolini T, Zagni I, et al.: Hepatocellular carcinoma in cirrhosis: incidence and risk factors. Gastroenterology 127 (5 Suppl 1): S35-50, 2004.15508101
Hartke J, Johnson M, Ghabril M: The diagnosis and treatment of hepatocellular carcinoma. Semin Diagn Pathol 34 (2): 153-159, 2017.28108047
Donato F, Tagger A, Gelatti U, et al.: Alcohol and hepatocellular carcinoma: the effect of lifetime intake and hepatitis virus infections in men and women. Am J Epidemiol 155 (4): 323-31, 2002.11836196
Ascha MS, Hanouneh IA, Lopez R, et al.: The incidence and risk factors of hepatocellular carcinoma in patients with nonalcoholic steatohepatitis. Hepatology 51 (6): 1972-8, 2010.20209604
White DL, Kanwal F, El-Serag HB: Association between nonalcoholic fatty liver disease and risk for hepatocellular cancer, based on systematic review. Clin Gastroenterol Hepatol 10 (12): 1342-1359.e2, 2012.23041539
Perumpail RB, Wong RJ, Ahmed A, et al.: Hepatocellular Carcinoma in the Setting of Non-cirrhotic Nonalcoholic Fatty Liver Disease and the Metabolic Syndrome: US Experience. Dig Dis Sci 60 (10): 3142-8, 2015.26250831
Chuang SC, Lee YC, Hashibe M, et al.: Interaction between cigarette smoking and hepatitis B and C virus infection on the risk of liver cancer: a meta-analysis. Cancer Epidemiol Biomarkers Prev 19 (5): 1261-8, 2010.20447919
Calzadilla Bertot L, Adams LA: The Natural Course of Non-Alcoholic Fatty Liver Disease. Int J Mol Sci 17 (5): , 2016.27213358
Streba LA, Vere CC, Rogoveanu I, et al.: Nonalcoholic fatty liver disease, metabolic risk factors, and hepatocellular carcinoma: an open question. World J Gastroenterol 21 (14): 4103-10, 2015.25892859
Kim D, Touros A, Kim WR: Nonalcoholic Fatty Liver Disease and Metabolic Syndrome. Clin Liver Dis 22 (1): 133-140, 2018.29128053
Kao JH: Hepatitis B vaccination and prevention of hepatocellular carcinoma. Best Pract Res Clin Gastroenterol 29 (6): 907-17, 2015.26651252
Singal AK, Salameh H, Kuo YF, et al.: Meta-analysis: the impact of oral anti-viral agents on the incidence of hepatocellular carcinoma in chronic hepatitis B. Aliment Pharmacol Ther 38 (2): 98-106, 2013.23713520
Chen JG, Egner PA, Ng D, et al.: Reduced aflatoxin exposure presages decline in liver cancer mortality in an endemic region of China. Cancer Prev Res (Phila) 6 (10): 1038-45, 2013.23963804
Kanwal F, Kramer J, Asch SM, et al.: Risk of Hepatocellular Cancer in HCV Patients Treated With Direct-Acting Antiviral Agents. Gastroenterology 153 (4): 996-1005.e1, 2017.28642197
Lafaro KJ, Demirjian AN, Pawlik TM: Epidemiology of hepatocellular carcinoma. Surg Oncol Clin N Am 24 (1): 1-17, 2015.25444466
El-Serag HB: Epidemiology of viral hepatitis and hepatocellular carcinoma. Gastroenterology 142 (6): 1264-1273.e1, 2012.22537432
Grewal P, Viswanathen VA: Liver cancer and alcohol. Clin Liver Dis 16 (4): 839-50, 2012.23101985
Bosetti C, Turati F, La Vecchia C: Hepatocellular carcinoma epidemiology. Best Pract Res Clin Gastroenterol 28 (5): 753-70, 2014.25260306
Rinella ME: Nonalcoholic fatty liver disease: a systematic review. JAMA 313 (22): 2263-73, 2015.26057287
Mittal S, El-Serag HB, Sada YH, et al.: Hepatocellular Carcinoma in the Absence of Cirrhosis in United States Veterans is Associated With Nonalcoholic Fatty Liver Disease. Clin Gastroenterol Hepatol 14 (1): 124-31.e1, 2016.26196445
Jinjuvadia R, Patel S, Liangpunsakul S: The association between metabolic syndrome and hepatocellular carcinoma: systemic review and meta-analysis. J Clin Gastroenterol 48 (2): 172-7, 2014.24402120
Qu C, Chen T, Fan C, et al.: Efficacy of neonatal HBV vaccination on liver cancer and other liver diseases over 30-year follow-up of the Qidong hepatitis B intervention study: a cluster randomized controlled trial. PLoS Med 11 (12): e1001774, 2014.25549238
McGlynn KA, Petrick JL, London WT: Global epidemiology of hepatocellular carcinoma: an emphasis on demographic and regional variability. Clin Liver Dis 19 (2): 223-38, 2015.25921660
Li DK, Ren Y, Fierer DS, et al.: The short-term incidence of hepatocellular carcinoma is not increased after hepatitis C treatment with direct-acting antivirals: An ERCHIVES study. Hepatology 67 (6): 2244-2253, 2018.29205416
Carrat F, Fontaine H, Dorival C, et al.: Clinical outcomes in patients with chronic hepatitis C after direct-acting antiviral treatment: a prospective cohort study. Lancet 393 (10179): 1453-1464, 2019.30765123
Li X, Sheng L, Liu L, et al.: Statin and the risk of hepatocellular carcinoma in patients with hepatitis B virus or hepatitis C virus infection: a meta-analysis. BMC Gastroenterol 20 (1): 98, 2020.32272891
Tsan YT, Lee CH, Wang JD, et al.: Statins and the risk of hepatocellular carcinoma in patients with hepatitis B virus infection. J Clin Oncol 30 (6): 623-30, 2012.22271485
Tsan YT, Lee CH, Ho WC, et al.: Statins and the risk of hepatocellular carcinoma in patients with hepatitis C virus infection. J Clin Oncol 31 (12): 1514-21, 2013.23509319
Simon TG, Duberg AS, Aleman S, et al.: Lipophilic Statins and Risk for Hepatocellular Carcinoma and Death in Patients With Chronic Viral Hepatitis: Results From a Nationwide Swedish Population. Ann Intern Med 171 (5): 318-327, 2019.31426090
Simon TG, Bonilla H, Yan P, et al.: Atorvastatin and fluvastatin are associated with dose-dependent reductions in cirrhosis and hepatocellular carcinoma, among patients with hepatitis C virus: Results from ERCHIVES. Hepatology 64 (1): 47-57, 2016.26891205
Singh S, Singh PP, Singh AG, et al.: Statins are associated with a reduced risk of hepatocellular cancer: a systematic review and meta-analysis. Gastroenterology 144 (2): 323-32, 2013.23063971

## Incidence, Mortality, and Survival

In the United States, liver cancer, regardless of histology, accounts for about 2% of cancer diagnoses and 5% of cancer deaths. Although liver cancer is not among the top ten diagnosed cancers in the United States,[1] it is the sixth-leading cause of cancer deaths.[1] About 42,240 new cases of liver cancer and 30,090 deaths are expected to occur in the United States in 2025.[2] Hepatocellular cancer accounts for about 70% of all liver cancers in the United States.[2] In 1975, liver cancer incidence in the United States was 2.64 per 100,000. In 2021, the rate had risen more than threefold to 8.39 per 100,000.[3] Five-year survival rates vary by stage, from a high of 37.3% for localized disease to a low of 3.3% for distant disease.[1] In the United States, rates of liver cancer incidence and liver cancer death are lowest in White individuals and highest in American Indian or Alaska Native individuals. Rates are also higher in Hispanic individuals than in non-Hispanic individuals.[1]

Worldwide, liver cancer is the sixth most common cancer and the third leading cause of cancer-related death.[4] Liver cancer resulted in about 865,269 new cases and 757,948 deaths in 2022;[4] in most countries, the liver annual incidence and mortality rates are nearly identical.[4] It is the fifth most frequently diagnosed cancer in adult men and the ninth most commonly diagnosed cancer in women.[4] The incidence of liver varies widely according to geographic location.[4] High-incidence regions include Northern and Western Africa (Egypt, the Gambia, Guinea) and Eastern and South-Eastern Asia (Mongolia, Cambodia, and Vietnam). Liver incidence is low in North and South America, most of Europe, Australia, and parts of the Middle East.[4,5] In all parts of the world, liver is more common in men than in women.[4,5]

### References

National Cancer Institute: SEER Stat Fact Sheets: Liver and Intrahepatic Bile Duct Cancer. Bethesda, Md: National Cancer Institute. Available online (https://seer.cancer.gov/statfacts/html/livibd.html). Last accessed December 5, 2024.
American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Surveillance Research Program, National Cancer Institute: SEER*Explorer: An interactive website for SEER cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://seer.cancer.gov/statistics-network/explorer/). Last accessed December 30, 2024.
Bray F, Laversanne M, Sung H, et al.: Global cancer statistics 2022: GLOBOCAN estimates of incidence and mortality worldwide for 36 cancers in 185 countries. CA Cancer J Clin 74 (3): 229-263, 2024.38572751
Jemal A, Bray F, Center MM, et al.: Global cancer statistics. CA Cancer J Clin 61 (2): 69-90, 2011 Mar-Apr.21296855

## Factors With Adequate Evidence of Increased Risk of HCC

### Chronic HBV Infection

Chronic hepatitis B virus (HBV) infection is the leading cause of hepatocellular cancer (HCC) in Asia and Africa.[1] Hepatitis B is transmitted through contact with infected blood, semen, or other body fluids. In areas with high incidence of chronic HBV infection and HCC, about 70% of infections are acquired in the perinatal period or in early childhood.[2] In addition to maternal-to-child transmission, HBV can be spread through sexual contact and contact with infected blood.[3] In the United States, the most common route of transmission is sharing drug-injecting needles.[4] It is estimated that 850,000 to 2.2 million people in the United States have chronic HBV infection [3] and that the infection is responsible for 10% to 15% of HCC cases.[5] The World Health Organization (WHO) estimates that 240 million people are infected worldwide.[4]

Evidence for a causal relationship between chronic HBV infection and HCC comes from etiological studies, case series, case-control studies, and prospective epidemiological studies.[2] Ecological studies demonstrate a strong positive correlation between the prevalence of chronic HBV and HCC incidence and mortality. HBV is present in liver tissue in nearly all patients who are seropositive for the virus and have HCC,[2] and HBV DNA has been found in 10% to 20% of HCC tumors in patients who are seronegative but are positive for HBV antibodies.[2] Case-control studies and prospective studies have observed odds ratios or relative risks (RRs) of at least 5 for chronic HBV infection.[2] Some prospective studies have observed RRs exceeding 50.[2] The lifetime risk of HCC in individuals chronically infected with HBV is estimated to be between 10% and 25%.[2] Clinical factors that have been reported to increase risk in individuals with chronic HBV infection include higher levels of HBV replication; certain HBV genotypes; longer duration of infection; and coinfection with hepatitis C virus (HCV), HIV, or hepatitis D virus.[6] The presence of cirrhosis increases risk, although HBV can cause HCC in the absence of cirrhosis.[7]

Coinfection with HCV appears to have an additive effect on risk.[8] In addition, degree of increased risk of chronic HBV varies with the presence of other factors and is discussed in sections of this summary that cover those specific factors.

### Chronic HCV Infection

Chronic HCV infection is the leading cause of HCC in North America, Europe, and Japan.[1] Chronic HCV infection accounts for about one-third of HCC cases in the United States.[4] HCV is a blood-borne pathogen; before screening of the blood supply or donated human organs (1992), HCV infection often was acquired during blood transfusions or organ transplants. Today, most new infections are caused by the sharing of drug-injecting needles. HCV can be transmitted during sexual contact, although this occurs infrequently. An estimated 2.7 to 3.9 million people in the United States have chronic hepatitis C.[9] In the United States, more cases are attributable to chronic HCV infection than to any other risk factor.[10]

Even though the mechanisms through which HCV increases HCC risk are unclear, chronic HCV infection is accepted as playing a causal role in the development of HCC. Evidence of a strong association comes primarily from cross-sectional and case-control studies, which suggest that individuals with HCV infection have at least a 15-fold increase in HCC risk, relative to individuals without HCV infection.[6] A prospective study of more than 23,000 residents of Taiwan observed a cumulative lifetime HCC incidence of 24% in men and 17% in women;[11] other prospective studies, including cases series of individuals accidently infected with HCV through blood transfusion, have produced a wide range of incidence estimates.[2] The reason for such variability is likely the variation in prevalence of advanced fibrosis and cirrhosis in the groups being studied. Chronic HCV infection typically leads to liver fibrosis, but HCC is rare in HCV-positive individuals with minimal or no fibrosis.[6] Once HCV-related cirrhosis develops, HCC develops annually in 1% to 8% of patients.[6] Other clinical factors that have been reported to increase risk in individuals with chronic HCV infection include coinfection with HBV or HIV, HCV genotype 1b, and steatosis.[6]

Coinfection with HBV appears to have an additive effect on risk.[8] In addition, degree of increased risk of chronic HCV varies with the presence of other factors and is discussed in sections of this summary that cover those specific factors.

### Cirrhosis

The prevalence of cirrhosis in the United States is estimated to be 0.3%, which corresponds to more than 600,000 adults.[12] Because cirrhosis is present in 70% to 90% of HCC patients at the time of diagnosis,[13] cirrhosis is considered a predisposing factor for HCC.[14] In autopsy studies, 80% to 90% of individuals who die of HCC have cirrhotic livers.[14] A standardized incidence ratio of 60 was observed in a prospective 16-year study of 11,065 Danish individuals with cirrhosis (more than one-half of cases caused by alcohol consumption).[2] The 5-year cumulative risk of developing HCC for patients with cirrhosis is 5% to 30%, with risk dependent on cause of cirrhosis and stage of cirrhosis.[6]

With perhaps the exception of aflatoxin B1, all HCC risk factors are also risk factors for cirrhosis.[1] In patients with established cirrhosis, HCC risk may be modifiable with elimination of the factor responsible for cirrhosis.[15] However, evidence to support that possibility is limited, and reduction in risk is likely to occur only in patients with precirrhotic changes or very early-stage cirrhosis.[15]

Patients with HCV-related cirrhosis are at greater risk of developing HCC than are those with cirrhosis related to HBV and alcohol-related cirrhosis.[14] Using data from several prospective studies, 5-year cumulative HCC incidence rates for individuals with cirrhosis and specific risk factors were estimated as follows: HCV, 30% in Japan and 17% in Western countries; HBV, 15% in endemic areas and 10% in Western countries; and alcohol, 8%.[14]

### Heavy Alcohol Use

Heavy alcohol use causes cirrhosis; between 8% and 20% of chronic alcoholics develop the condition.[1] HCC also occurs in heavy alcohol users who do not have cirrhosis. Some data exist to suggest a synergistic effect on HCC risk by heavy alcohol use and tobacco use, fatty liver disease, and metabolic syndrome (MetS) components.[16]

Many epidemiological studies have examined the association of alcohol use and HCC; those that could examine the impact of increasing exposure typically have seen a positive correlation between consumption and risk. The following RRs (95% confidence intervals [CIs]) were generated by using models derived from a meta-analysis: 1.19 (1.12–1.27) for 25 g of alcohol per day; 1.40 (1.25–1.56) for 50 g/d; and 1.81 (1.50–2.19) for 100 g/d.[1] While there is agreement that alcohol consumption, especially heavy consumption, is an important HCC risk factor, the magnitude of the increase in risk varies across studies.[16] Some studies report a twofold increase in risk with heavy consumption, while others observe a greater increase, at least fivefold. Variability is likely caused by many factors, including choice of control subjects, choice of referent categories, definition of heavy alcohol use, and presence of cofactors.

Alcoholics with cirrhosis appear to have a roughly tenfold risk of developing HCC, relative to alcoholics without cirrhosis.[14,16] In a cohort study of alcoholics, the summary incidence rate was 0.2 per 100 person-years in people with cirrhosis, and 0.01 per 100 person-years in those without cirrhosis.[14] The evidence for a twofold to threefold increase in risk with heavy alcohol use is more consistent for individuals with chronic HCV infection than for individuals with chronic HBV infection.[16] An Italian case-control study observed synergistic effects of heavy alcohol use and HBV or HCV infection: heavy alcohol use and HBV infection led to a 50-fold increase in risk, and heavy alcohol use and HCV infection led to a 100-fold increase in risk, relative to absence of heavy alcohol use and HBV or HCV infection.[17]

### Aflatoxin B1

Aflatoxin B1 is a mycotoxin that can contaminate corn and peanuts stored in warm, humid environments.[2] The highest levels of aflatoxin B1 exposure are found in sub-Saharan Africa, Southeast Asia, and China.[18]

Aflatoxin B1 was deemed a carcinogen by the International Agency for Research on Cancer (IARC) in 1987.[2] The population-attributable risk of aflatoxin B1 to HCC is estimated to be 20% in the Western Pacific (including China), 27% in southeast Asia, and 40% in Africa.[19] Exposure may be responsible for up to 155,000 HCC cases worldwide.[19]

Prospective cohort studies established aflatoxin B1 as an etiologic agent for HCC, and demonstrated that magnitude of risk varies by presence or absence of chronic HBV infection. A nested case-control study comprising about 18,000 men who resided in Shanghai in the 1980s indicated that aflatoxin exposure increases risk 4-fold among individuals without chronic HBV infection, but exposure increases risk 60-fold among individuals with chronic HBV infection.[20] A subsequent cohort study in Taiwan observed a similar multiplicative or more-than-multiplicative increase in risk with the presence of both factors, relative to the presence of neither factor.[20]

### NASH

Nonalcoholic steatohepatitis (NASH) is an aggressive yet dynamic condition; it can regress, persist at a relatively constant level of activity, or cause progressive fibrosis that leads to cirrhosis. It is estimated that 6% of the U.S. adult population has NASH and that 2% of U.S. adults will develop NASH-related cirrhosis at some time in their lives.[21]

At least 17 prospective cohort studies have examined HCC risk in patients with either NASH or nonalcoholic fatty liver disease (NAFLD), but few have examined NASH patients alone.[22] The most frequently referenced study of NASH patients is a prospective study conducted in the United States that examined HCC experience in 195 patients with NASH-related cirrhosis. After a median follow-up of 3.2 years, 13% of the patients had been diagnosed with HCC.[23] Yearly cumulative incidence in this case series was 2.6%. A case series of HCV patients was conducted concurrently; that group experienced higher rates (20% had an HCC diagnosis, and yearly cumulative incidence was 4%).

HCC has been observed in patients with NASH who do not have cirrhosis. Reliable risk estimates are not available, but most researchers believe that these individuals are at elevated risk, albeit lower than in those with cirrhosis.[22]

MetS, obesity, type 2 diabetes, insulin resistance, hypertension, and hyperlipidemia or dyslipidemia, are suspected risk factors for HCC and are associated with NASH. A study of 8.5 million people from 22 countries reported prevalence estimates for NASH patients with the following diagnoses: overweight or obesity, 80%; hyperlipidemia or dyslipidemia, 72%; type 2 diabetes, 44%; and MetS, 71%.[24]

### Cigarette Smoking

The relationship between tobacco use and liver cancer has been studied extensively for many years.[25] Early epidemiological studies produced positive associations, but doubt regarding the legitimacy of tobacco use as an independent risk factor existed because of the possibility of residual confounding by HBV status, HCV status, and alcohol consumption. In addition, some studies also suggested that the increase in risk might exist only in subgroups, particularly in patients with chronic HBV infection. In 2004, the IARC reported that tobacco use was causally associated with HCC; that conclusion was on the basis of studies that had consistently shown increased risk with increased duration or intensity of tobacco use after careful consideration of potential confounders.[25] In 2014, the U.S. Surgeon General concluded a causal relationship on the basis of study results published after 2004.[26]

An extensive meta-analysis published in 2009 examined 38 cohort and 58 case-control studies that evaluated the relationship between cigarette smoking and liver cancer.[25] Studies varied in their degree of adjustment for possible confounders, though most adjusted for age and about one-third adjusted for alcohol consumption. Relative to never-smokers, the summary RR (SRR) for current smokers was 1.51 (95% CI, 1.37–1.67) and for former smokers, 1.12 (95% CI, 0.78–1.60). The point estimate was similar when restricted to five high-quality studies that adjusted for alcohol use (RR, 1.45; 95% CI, 1.14–1.80); the point estimates were similar but not significant when restricted to three studies that adjusted for chronic HBV infection and three studies that adjusted for chronic HCV infection. A dose-response relationship for the number of cigarettes smoked per day was observed, even though there was substantial statistical heterogeneity in the eight studies that were analyzed together for that analysis. A prospective cohort study published after the meta-analysis observed significant linear increases in risk with increasing number of cigarettes smoked per day, years smoked, and pack-years; analyses were adjusted for grams of alcohol consumed per day, and significant linear increases also were observed when daily drinkers were excluded.[27]

A meta-analysis that examined the relationship of cigarette smoking in the presence and absence of chronic HBV or HCV infection observed the following:[28] in the absence of viral infection, cigarette smoking was associated with an RR of about 1.5 to 2; in the presence of HBV, the increase in risk appeared additive; and in the presence of HCV, the increase in risk appeared to be more than multiplicative. Relative to persons who were negative for HBV and did not smoke cigarettes, the adjusted random effects estimate was 21.7 (11.8–40) for those with HBV who smoked cigarettes. Relative to individuals who were negative for HCV and did not smoke cigarettes, the adjusted random effects estimate was 19.6 (1.55–247) for those with HCV who smoked cigarettes.[28]

### Certain Rare Medical and Genetic Conditions (Untreated HH, Alpha-1-Antitrypsin Deficiency, Glycogen Storage Disease, Porphyria Cutanea Tarda, and Wilson Disease)

Untreated hereditary hemochromatosis (HH), alpha-1-antitrypsin (AAT) deficiency, glycogen storage disease, porphyria cutanea tarda (PCT), and Wilson disease are known to increase the risk of developing HCC. While increases in risk are known or believed to be large, these conditions contribute little to the burden of HCC.

Hemochromatosis is an autosomal recessive disorder that leads to excessive absorption of dietary iron and subsequent iron loading in certain organs, including the liver.[2] Between 1 in 200 and 1 in 400 individuals of northern European descent carry the most common genetic mutation, although many of these individuals do not develop progressive iron overload.[29] Patients with untreated hemochromatosis may develop cirrhosis. The annual incidence of HCC in patients with hemochromatosis is 4% once cirrhosis has been established.[30] In cohorts of patients with untreated hemochromatosis and cirrhosis, the observed number of HCC cases is at least 20-fold higher than expected.[29] HCC is seen, albeit rarely, in hemochromatosis patients who do not have cirrhosis.[29] Between 25% and 45% of premature deaths in hemochromatosis patients are caused by HCC.[29] Hemochromatosis can be treated successfully through phlebotomy, repeated at necessary intervals.[30] Treatment before the development of cirrhosis appears to greatly reduce the risk of HCC.[30] It is hypothesized that the presence of other HCC risk factors, particularly chronic HBV infection, chronic HCV infection, and heavy alcohol use, could increase risk among patients with untreated hemochromatosis in a more-than-additive manner,[29] but appropriate data in which to explore this possibility are not available.

AAT deficiency is an inherited disorder affecting the lungs, liver, and rarely, the skin. It is estimated that about 100,000 individuals in the United States have AAT deficiency.[31] Liver disease results from the accumulation within hepatocytes of unsecreted variant AAT proteins.[32] Individuals with certain AAT deficiency genotypes are at high risk of developing HCC.[33]

Glucose-6-phosphatase deficiency (G6PD) is an autosomal-recessive disorder. It also is known as von Gierke disease and is more commonly known as glycogen storage disease, or GSD1. The defective enzymes involved are mainly active in the liver and kidneys. The incidence of GSD1 is 1 per 100,000 live births. HCC is recognized as a late complication of GSD1.[34] No estimates of increase in HCC risk are available.

PCT is the result of deficient activity of hepatic uroporphyrinogen; acute intermittent porphyria (AIP, also known as Swedish porphyria) is characterized by deficient activity of porphobilinogen. The prevalence of PCT in the United States is 1 in 25,000.[35] PCT and AIP are associated with increases in HCC risk.[2] A prospective study in Sweden of individuals with porphyria observed a standardized incidence ratio of 21 for PCT and 70 for AIP.[36]

Wilson disease (hepatolenticular degeneration) is caused by a genetic abnormality inherited in an autosomal recessive manner that leads to impairment of cellular copper transport. Worldwide prevalence is approximately 1 in 30,000 live births.[37] Wilson disease causes progressive liver damage, including cirrhosis. The association between Wilson disease and HCC is uncertain but suspected given that tumors of the liver, including HCC, are observed in Wilson disease patients.[38]

### References

Lafaro KJ, Demirjian AN, Pawlik TM: Epidemiology of hepatocellular carcinoma. Surg Oncol Clin N Am 24 (1): 1-17, 2015.25444466
London WT, McGlynn K: Liver cancer. In: Schottenfeld D, Fraumeni JF Jr, eds.: Cancer Epidemiology and Prevention. 3rd ed. Oxford University Press, 2006, pp 763-86.
Centers for Disease Control and Prevention: Hepatitis B FAQs for the Public. Atlanta, GA: Centers for Disease Control and Prevention, Division of Viral Hepatitis, 2016. Available online (https://www.cdc.gov/hepatitis-b/about/?CDC_AAref_Val=https://www.cdc.gov/hepatitis/hbv/bfaq.htm). Last accessed December 5, 2024.
U.S. Department of Health and Human Services: Hepatitis B Basic Information. Washington, DC: U.S. Department of Health and Human Services, 2017. Available online (https://www.hhs.gov/hepatitis/learn-about-viral-hepatitis/hepatitis-b-basics/index.html). Last accessed December 5, 2024.
Mittal S, El-Serag HB: Epidemiology of hepatocellular carcinoma: consider the population. J Clin Gastroenterol 47 (Suppl): S2-6, 2013.23632345
El-Serag HB: Epidemiology of viral hepatitis and hepatocellular carcinoma. Gastroenterology 142 (6): 1264-1273.e1, 2012.22537432
Ferlay J, Soerjomataram I, Dikshit R, et al.: Cancer incidence and mortality worldwide: sources, methods and major patterns in GLOBOCAN 2012. Int J Cancer 136 (5): E359-86, 2015.25220842
El-Serag HB, Kanwal F: Epidemiology of hepatocellular carcinoma in the United States: where are we? Where do we go? Hepatology 60 (5): 1767-75, 2014.24839253
Centers for Disease Control and Prevention: Hepatitis C FAQs for Health Professionals. Atlanta, GA: Centers for Disease Control and Prevention, Division of Viral Hepatitis, 2017. Available online (https://www.cdc.gov/hepatitis-c/hcp/resources/). Last accessed December 5, 2024.
Ghouri YA, Mian I, Rowe JH: Review of hepatocellular carcinoma: Epidemiology, etiology, and carcinogenesis. J Carcinog 16: 1, 2017.28694740
Huang YT, Jen CL, Yang HI, et al.: Lifetime risk and sex difference of hepatocellular carcinoma among patients with chronic hepatitis B and C. J Clin Oncol 29 (27): 3643-50, 2011.21859997
Scaglione S, Kliethermes S, Cao G, et al.: The Epidemiology of Cirrhosis in the United States: A Population-based Study. J Clin Gastroenterol 49 (8): 690-6, 2015.25291348
Hartke J, Johnson M, Ghabril M: The diagnosis and treatment of hepatocellular carcinoma. Semin Diagn Pathol 34 (2): 153-159, 2017.28108047
Fattovich G, Stroffolini T, Zagni I, et al.: Hepatocellular carcinoma in cirrhosis: incidence and risk factors. Gastroenterology 127 (5 Suppl 1): S35-50, 2004.15508101
Saffioti F, Pinzani M: Development and Regression of Cirrhosis. Dig Dis 34 (4): 374-81, 2016.27170391
Grewal P, Viswanathen VA: Liver cancer and alcohol. Clin Liver Dis 16 (4): 839-50, 2012.23101985
Donato F, Tagger A, Gelatti U, et al.: Alcohol and hepatocellular carcinoma: the effect of lifetime intake and hepatitis virus infections in men and women. Am J Epidemiol 155 (4): 323-31, 2002.11836196
McGlynn KA, Petrick JL, London WT: Global epidemiology of hepatocellular carcinoma: an emphasis on demographic and regional variability. Clin Liver Dis 19 (2): 223-38, 2015.25921660
Liu Y, Wu F: Global burden of aflatoxin-induced hepatocellular carcinoma: a risk assessment. Environ Health Perspect 118 (6): 818-24, 2010.20172840
Chen JG, Egner PA, Ng D, et al.: Reduced aflatoxin exposure presages decline in liver cancer mortality in an endemic region of China. Cancer Prev Res (Phila) 6 (10): 1038-45, 2013.23963804
Diehl AM, Day C: Cause, Pathogenesis, and Treatment of Nonalcoholic Steatohepatitis. N Engl J Med 377 (21): 2063-2072, 2017.29166236
White DL, Kanwal F, El-Serag HB: Association between nonalcoholic fatty liver disease and risk for hepatocellular cancer, based on systematic review. Clin Gastroenterol Hepatol 10 (12): 1342-1359.e2, 2012.23041539
Ascha MS, Hanouneh IA, Lopez R, et al.: The incidence and risk factors of hepatocellular carcinoma in patients with nonalcoholic steatohepatitis. Hepatology 51 (6): 1972-8, 2010.20209604
Younossi ZM, Koenig AB, Abdelatif D, et al.: Global epidemiology of nonalcoholic fatty liver disease-Meta-analytic assessment of prevalence, incidence, and outcomes. Hepatology 64 (1): 73-84, 2016.26707365
Lee YC, Cohet C, Yang YC, et al.: Meta-analysis of epidemiologic studies on cigarette smoking and liver cancer. Int J Epidemiol 38 (6): 1497-511, 2009.19720726
Cancer. In: U.S. Department of Health and Human Services: The Health Consequences of Smoking—50 Years of Progress: A Report of the Surgeon General. U.S. Department of Health and Human Services, CDC, National Center for Chronic Disease Prevention and Health Promotion, Office on Smoking and Health, 2014, pp 139-351. Also available online (https://www.ncbi.nlm.nih.gov/books/NBK294309/). Last accessed December 5, 2024.
Koh WP, Robien K, Wang R, et al.: Smoking as an independent risk factor for hepatocellular carcinoma: the Singapore Chinese Health Study. Br J Cancer 105 (9): 1430-5, 2011.21915129
Chuang SC, Lee YC, Hashibe M, et al.: Interaction between cigarette smoking and hepatitis B and C virus infection on the risk of liver cancer: a meta-analysis. Cancer Epidemiol Biomarkers Prev 19 (5): 1261-8, 2010.20447919
Harrison SA, Bacon BR: Relation of hemochromatosis with hepatocellular carcinoma: epidemiology, natural history, pathophysiology, screening, treatment, and prevention. Med Clin North Am 89 (2): 391-409, 2005.15656932
Villanueva A, Newell P, Hoshida Y: Inherited hepatocellular carcinoma. Best Pract Res Clin Gastroenterol 24 (5): 725-34, 2010.20955973
Campos MA, Wanner A, Zhang G, et al.: Trends in the diagnosis of symptomatic patients with alpha1-antitrypsin deficiency between 1968 and 2003. Chest 128 (3): 1179-86, 2005.16162704
Lomas DA, Evans DL, Finch JT, et al.: The mechanism of Z alpha 1-antitrypsin accumulation in the liver. Nature 357 (6379): 605-7, 1992.1608473
Nelson DR, Teckman J, Di Bisceglie AM, et al.: Diagnosis and management of patients with α1-antitrypsin (A1AT) deficiency. Clin Gastroenterol Hepatol 10 (6): 575-80, 2012.22200689
Limmer J, Fleig WE, Leupold D, et al.: Hepatocellular carcinoma in type I glycogen storage disease. Hepatology 8 (3): 531-7, 1988 May-Jun.2453430
Harber LC, Bickers DR: Photosensitivity Diseases: Principles of Diagnosis and Treatment. Saunders, 1981.
Linet MS, Gridley G, Nyrén O, et al.: Primary liver cancer, other malignancies, and mortality risks following porphyria: a cohort study in Denmark and Sweden. Am J Epidemiol 149 (11): 1010-5, 1999.10355376
Huster D: Wilson disease. Best Pract Res Clin Gastroenterol 24 (5): 531-9, 2010.20955957
Pfeiffenberger J, Mogler C, Gotthardt DN, et al.: Hepatobiliary malignancies in Wilson disease. Liver Int 35 (5): 1615-22, 2015.25369181

## Factors With Inadequate Evidence of Increased Risk of HCC

### NAFL

Nonalcoholic fatty liver (NAFL) is diagnosed when hepatic steatosis cannot be explained by alcohol use or viral infection.[1] It generally is an asymptomatic, benign condition and is often detected incidentally.[2] NAFL can progress to cirrhosis or nonalcoholic steatohepatitis (NASH). Up to 4% of NAFL patients may develop cirrhosis,[3] and a small clinical study suggested that between 20% and 50% of NAFL patients may develop NASH.[4] The observation that NAFL patients have developed these conditions, which are known to increase hepatocellular cancer (HCC) risk, leads to the conclusion that NAFL increases HCC risk.

Even though NAFL and NASH have different clinical relevance, they often are combined into one clinical entity known as NAFLD (nonalcoholic fatty liver disease). While prevalence estimates and measures of relative risk (RR) are available for NAFLD and NASH, they are unavailable for NAFL. NAFLD estimates can provide an upper bound for NAFL, however.

In the United States, NAFLD prevalence is estimated at 25%.[5] NAFLD prevalence has more than doubled in the last 30 years [1] and is now the most common liver disorder in the United States.[1] NAFLD is sometimes referred to as the hepatic presentation of metabolic syndrome (MetS);[5] increases in NAFLD rates parallel those of MetS, including obesity and type 2 diabetes.[1] MetS, obesity, and type 2 diabetes are frequent NAFLD comorbidities. Estimates of global prevalence of MetS, obesity, and type 2 diabetes in individuals with NAFLD are as follows: MetS, 43%; obesity, 51%; and type 2 diabetes, 23%.[1] A meta-analysis that considered data from countries around the world reported that the HCC incidence rate ratio for NAFLD versus non-NAFLD patients was 1.94 (95% confidence interval [CI], 1.28–2.92).[1] HCC has been diagnosed in patients with both cirrhotic and noncirrhotic NAFLD.[6] A study of 1,500 U.S. Veterans' Administration patients with NAFLD, 107 patients developed HCC. Of the 107 patients, 6 patients had level 1 evidence (histological) of no cirrhosis, and 31 patients had level 2 evidence (imaging or biospecimen) of no cirrhosis.[7] Furthermore, the percentage of noncirrhotic HCC patients among those with NAFLD was greater than was observed for other known HCC risk factors.[7]

### MetS

MetS is diagnosed when at least three of five metabolic risk factors (central adiposity, high triglyceride levels, low levels of high-density lipoprotein, high fasting glucose levels, and hypertension) are present.[8] The prevalence of MetS has been rising for at least the last 30 years, and by 2012, more than one-third of U.S. adults met the criteria for MetS.[9]

A meta-analysis of more than 7,000 HCC cases from five studies produced a risk ratio of 1.8 (95% CI, 1.37–2.40) for a diagnosis of MetS.[10] The combined risk ratios were varied (range, 1.2 [95% CI, 0.55–2.53] to 3.7 [96% CI, 1.78–7.58]).

MetS and NAFLD are frequently comorbid conditions. The prevalence of MetS among patients with NAFLD was estimated to be 42.5% in a meta-analysis that included studies from around the world.[1] Given that obesity and type 2 diabetes, two suspected HCC risk factors, are component causes of MetS and also prevalent in patients with NAFLD, attempts to disentangle the independent impact on HCC risk of MetS using epidemiological data is not warranted. Observed associations should not be interpreted as causal relationships.

Only a few studies have examined insulin resistance, hypertension, and dyslipidemia, yet there is a suggestion that the first two are associated with an increase in HCC risk.[11] These factors will not be discussed further.

### Obesity

Obesity has been considered extensively as a risk factor for HCC, and in most instances, a positive association has been observed. A European multicenter prospective cohort study with 177 HCC cases examined central obesity, as measured by waste-to-hip ratio, and observed a more-than-threefold increase in HCC risk for the highest tertile (males, ≥ 27.81; females, ≥ 26.65), relative to the lowest (RR, 3.51; 95% CI, 2.09–5.87), after adjustment for several potential confounders, including alcohol consumption.[12] A meta-analysis of 26 prospective studies (25,337 HCC cases) reported that obesity (BMI ≥ 30 kg/m^2^) was associated with an increased risk of primary liver cancer (SRR, 1.83; 95% CI, 1.59–2.11). Of note is that the included studies varied in their control for confounding, with 11 not controlling for alcohol consumption and 15 not controlling for history of diabetes; furthermore, not all studies were population based. Nevertheless, point estimates were somewhat consistently suggestive of a modest increase in risk, and associations of a similar magnitude have been seen in Japanese and U.S. populations.[13,14]

NAFLD is estimated to be present in up to 90% of individuals with obesity.[15] Obesity is a component cause of MetS, another suspected HCC risk factor; obesity also is a frequent comorbidity to type 2 diabetes, yet another suspected HCC risk factor. Attempts to disentangle the independent impact on HCC risk of obesity using epidemiological data is not warranted. Observed associations should not be interpreted as causal relationships.

### Type 2 Diabetes

Type 2 diabetes has been considered extensively as a risk factor for HCC, and in most instances, positive associations have been observed. The most recent meta-analysis of diabetes and HCC was published in 2012.[16] Seventeen case-control studies and 32 cohort studies were included, and a summary RR of 2.31 (95% CI, 1.87–2.84) for either type 1 or type 2 diabetes was observed. Of the 49 studies used to produce the summary RR, only 19 adjusted for alcohol use and 13 for obesity, and not all were population based. The summary risk estimate for type 2 diabetes alone, based on data from 13 studies, was 2.18 (95% CI, 1.58–3.01). Studies published since the meta-analysis produced estimates similar to those of the summary measure.[17]

NAFLD is estimated to be present in up to 70% of individuals with type 2 diabetes.[15] Type 2 diabetes is a component cause of MetS, another suspected HCC risk factor; type 2 diabetes is a frequent comorbidity to obesity, yet another suspected HCC risk factor. An additional complexity is that diabetes can be caused by cirrhosis.[18] With the exception of cirrhosis, attempts to disentangle the independent impact on HCC risk of type 2 diabetes using epidemiological data is not warranted. Observed associations should not be interpreted as causal relationships.

### References

Younossi ZM, Stepanova M, Afendy M, et al.: Changes in the prevalence of the most common causes of chronic liver diseases in the United States from 1988 to 2008. Clin Gastroenterol Hepatol 9 (6): 524-530.e1; quiz e60, 2011.21440669
Dyson JK, Anstee QM, McPherson S: Non-alcoholic fatty liver disease: a practical approach to diagnosis and staging. Frontline Gastroenterol 5 (3): 211-218, 2014.25018867
Rinella ME: Nonalcoholic fatty liver disease: a systematic review. JAMA 313 (22): 2263-73, 2015.26057287
Calzadilla Bertot L, Adams LA: The Natural Course of Non-Alcoholic Fatty Liver Disease. Int J Mol Sci 17 (5): , 2016.27213358
Younossi ZM, Koenig AB, Abdelatif D, et al.: Global epidemiology of nonalcoholic fatty liver disease-Meta-analytic assessment of prevalence, incidence, and outcomes. Hepatology 64 (1): 73-84, 2016.26707365
Baffy G, Brunt EM, Caldwell SH: Hepatocellular carcinoma in non-alcoholic fatty liver disease: an emerging menace. J Hepatol 56 (6): 1384-91, 2012.22326465
Mittal S, El-Serag HB, Sada YH, et al.: Hepatocellular Carcinoma in the Absence of Cirrhosis in United States Veterans is Associated With Nonalcoholic Fatty Liver Disease. Clin Gastroenterol Hepatol 14 (1): 124-31.e1, 2016.26196445
Kim D, Touros A, Kim WR: Nonalcoholic Fatty Liver Disease and Metabolic Syndrome. Clin Liver Dis 22 (1): 133-140, 2018.29128053
Aguilar M, Bhuket T, Torres S, et al.: Prevalence of the metabolic syndrome in the United States, 2003-2012. JAMA 313 (19): 1973-4, 2015.25988468
Jinjuvadia R, Patel S, Liangpunsakul S: The association between metabolic syndrome and hepatocellular carcinoma: systemic review and meta-analysis. J Clin Gastroenterol 48 (2): 172-7, 2014.24402120
Rahman R, Hammoud GM, Almashhrawi AA, et al.: Primary hepatocellular carcinoma and metabolic syndrome: An update. World J Gastrointest Oncol 5 (9): 186-94, 2013.24069511
Schlesinger S, Aleksandrova K, Pischon T, et al.: Abdominal obesity, weight gain during adulthood and risk of liver and biliary tract cancer in a European cohort. Int J Cancer 132 (3): 645-57, 2013.22618881
Welzel TM, Graubard BI, Zeuzem S, et al.: Metabolic syndrome increases the risk of primary liver cancer in the United States: a study in the SEER-Medicare database. Hepatology 54 (2): 463-71, 2011.21538440
Chen Y, Wang X, Wang J, et al.: Excess body weight and the risk of primary liver cancer: an updated meta-analysis of prospective studies. Eur J Cancer 48 (14): 2137-45, 2012.22446023
Streba LA, Vere CC, Rogoveanu I, et al.: Nonalcoholic fatty liver disease, metabolic risk factors, and hepatocellular carcinoma: an open question. World J Gastroenterol 21 (14): 4103-10, 2015.25892859
Wang P, Kang D, Cao W, et al.: Diabetes mellitus and risk of hepatocellular carcinoma: a systematic review and meta-analysis. Diabetes Metab Res Rev 28 (2): 109-22, 2012.21898753
Wainwright P, Scorletti E, Byrne CD: Type 2 Diabetes and Hepatocellular Carcinoma: Risk Factors and Pathogenesis. Curr Diab Rep 17 (4): 20, 2017.28290049
Ferlay J, Soerjomataram I, Dikshit R, et al.: Cancer incidence and mortality worldwide: sources, methods and major patterns in GLOBOCAN 2012. Int J Cancer 136 (5): E359-86, 2015.25220842

## Interventions With Adequate Evidence of Decreased Risk of HCC

### HBV Vaccination

Hepatitis B virus (HBV) vaccines became available for the prevention of HBV infection in the early 1980s.[1] The World Health Organization recommends that all infants receive the hepatitis B vaccine as soon as possible after birth, preferably within 24 hours.[2] By 2011, 180 countries had introduced infant HBV vaccination, and the global HBV vaccination coverage rate for the final dose was estimated to be about 78%.[1] It is estimated that in 2015, the worldwide prevalence of HBV infection in children younger than 5 years was about 1.3%, compared with about 4.7% in the prevaccination era.[2]

Epidemiological evidence regarding the ability of hepatitis B vaccination to reduce hepatocellular cancer (HCC) comes from follow-up studies of children and risk of childhood liver cancer. In a cluster randomized controlled trial of HBV immunization of 75,000 newborns in Qidong, China (an area where HBV is endemic), the incidence ratio of primary liver cancer in the vaccination-at-birth group compared with the control group (68% of whom received catch-up vaccinations at ages 10–14 years) was 0.16 (95% confidence interval [CI], 0.03–0.77).[3] A registry study conducted in Taiwan identified 1,509 patients aged 6 to 26 years with HCC, and observed that HCC incidence per 100,000 person-years was 0.92 in the unvaccinated cohort and 0.23 in the vaccinated birth cohorts.[4]

It is too soon to know if neonate vaccination also will reduce HCC risk in later adulthood, and no data have been published on the impact of vaccination in adulthood. Nevertheless, vaccination at any age before infection should reduce HCC risk. Mathematical modeling suggests that neonatal HBV vaccination ultimately will lead to the elimination of 70% to 85% of HBV-related HCC cases worldwide.[5] Booster immunizations currently are not recommended for those who are not immunocompromised.[6]

### Treatment for Chronic HBV Infection

The presence of hepatitis B surface antigen for more than 6 months identifies patients with chronic HBV infection. Expanded and sustained HBV vaccination ultimately will decrease the prevalence of individuals with chronic HBV infection, but the need to minimize downstream consequences of chronic infection, including the risk of HCC, exists for the foreseeable future. Anti-HBV treatment options for chronic HBV carriers are interferon and nucleos(t)ide analogues (NAs). Interferon is used in young patients who want a short course of therapy and have well-compensated liver disease,[7] although it is not consistently associated with a reduction in HCC incidence. There are several NAs that are preferred because of their low risk of viral resistance (e.g., entecavir, tenofovir disoproxil fumarate, and tenofovir alafenamide). Other NAs (e.g., lamivudine, adefovir, and telbivudine) are available, although they are less preferred because of the emergence of viral resistance, which may lead to hepatic decompensation.[8] Reductions in HCC risk, when observed for interferon therapy, have typically been among treatment responders with preexisting liver cirrhosis.[9] A reduction in HCC risk has been consistently observed for patients treated with NA therapy, regardless of cirrhosis status.[9]

The decision to initiate anti-HBV therapy depends on several factors, including the presence or absence of hepatitis B e antigen (HBeAg), a relative increase of alanine transaminase (ALT) compared with the upper limit of normal (ULN), HBV DNA level, degree of fibrosis, and age. It has been recommended that patients in the immune-active phase of chronic HBV be treated with anti-HBV therapy. Patients are considered to be in the immune-active phase if they have evidence of liver inflammation and are either: (1) HBeAg-positive with an HBV DNA level of more than 20,000 IU/mL and an ALT level more than two times the ULN, or (2) HBeAg-negative with an HBV DNA level of more than 2,000 IU/mL and an ALT level more than two times the ULN.[8] Patients with inactive HBV, in general, have normal ALT levels and HBV DNA levels of more than 2,000 IU/mL.[8]

Antiviral therapy has not been routinely recommended for patients who are not in the immune-active phase. Patients who are neither in the immune-active phase nor in one of the other standard phases of chronic HBV (immune-tolerant phase or inactive phase) are considered to be in an indeterminate phase, representing approximately 40% of patients with chronic HBV.[10] The 10-year cumulative incidence of HCC was higher among patients in the indeterminate phase of chronic HBV (4.6%; 95% CI, 3.0%–7.2%) compared with patients in the inactive phase (0.5%; 95% CI, 0.2%–1.3%).[10] However, their risk may be reduced if anti-HBV therapy is initiated.

In a multicenter, international, retrospective cohort study of 819 patients with chronic HBV who had no fibrosis or liver cirrhosis in the indeterminate phase, anti-HBV therapy was associated with a 70% reduction in HCC risk (hazard ratio [HR], 0.30; 95% CI, 0.10–0.60).[10] The cumulative incidence of HCC was significantly lower in those treated with anti-HBV therapy compared with those who were not, with proportions as follows:

- At 10 years, 3.9% (95% CI, 1.9%–7.8%) versus 14.7% (95% CI, 9.6%–22.0%).
- At 15 years, 9.4% (95% CI 4.5%–19.3%) versus 19.1% (95% CI, 12.9%–27.6%).

While these findings suggest a significant benefit of anti-HBV therapy in reducing HCC incidence, several limitations should be noted. Firstly, the study did not specify details on HCC surveillance or the HCC diagnostic criteria used, although it was reported that diagnoses were made according to the American Association for the Study of Liver Diseases (AASLD) guidelines, using either pathology or noninvasive imaging. Additionally, the study did not provide information about the specific types or doses of anti-HBV therapy administered, although it was noted that patients in the treatment group remained on therapy throughout follow-up.[11]

The degree of HCC risk reduction with NA therapy has been nearly consistent across studies, with treated patients experiencing about half the risk of those who are not treated with NA therapy.[9,12] Most studies have been conducted in countries outside North America, yet the two studies conducted in North America observed similarly-sized, statistically significant reductions. A Canadian cohort of 322 patients with chronic HBV infection experienced lower than expected rates of HCC with a standardized incidence ratio of 0.46 (95% CI, 0.23–0.82) for patients treated with NA therapy, relative to those who were not.[13] A U.S. cohort of more than 2,000 patients with chronic HBV infection observed an HR of 0.39 (95% CI, 0.27–0.56) with treatment, although the cohort included patients treated with interferon.[14]

#### Potential harms of treatment for chronic HBV infection

NA-based therapy is generally considered safe with limited side effects. Lactic acidosis has been reported along with renal toxicity and osteomalacia. In patients with chronic HBV infection and known renal or bone disease, tenofovir alafenamide may be considered as it has been found to be more stable in the plasma and delivers active metabolite to hepatocytes efficiently, allowing a lower dose and less risk of bone and renal toxicity. Interferon-based therapy has been associated with flu-like symptoms, fatigue, mood disturbances, cytopenias, and autoimmune disorders.[8]

### Availability of Food Not Contaminated With Aflatoxin B1

Qidong, China, historically has had exceptionally high rates of primary liver cancer due to endemic chronic HBV infection and a food supply (predominately corn) with high levels of aflatoxin B1 contamination. Agricultural reforms in the 1980s led to greater availability of rice, which typically harbors much lower levels of aflatoxin B1. A population-based cancer registry was used to examine primary liver cancer mortality in Qidong residents born before 2002, the year that universal HBV vaccination of newborns was achieved. For that group, a higher-than-50% reduction in mortality from primary liver cancer was observed following the availability of rice. About 80% of the benefit was estimated to be among those infected with HBV.[15]

### References

Kao JH: Hepatitis B vaccination and prevention of hepatocellular carcinoma. Best Pract Res Clin Gastroenterol 29 (6): 907-17, 2015.26651252
World Health Organization: Hepatitis B Fact Sheet. Geneva, Switzerland: World Health Organization, 2017. Available online (http://www.who.int/en/news-room/fact-sheets/detail/hepatitis-b). Last accessed December 5, 2024.
Qu C, Chen T, Fan C, et al.: Efficacy of neonatal HBV vaccination on liver cancer and other liver diseases over 30-year follow-up of the Qidong hepatitis B intervention study: a cluster randomized controlled trial. PLoS Med 11 (12): e1001774, 2014.25549238
Chang MH, You SL, Chen CJ, et al.: Long-term Effects of Hepatitis B Immunization of Infants in Preventing Liver Cancer. Gastroenterology 151 (3): 472-480.e1, 2016.27269245
McGlynn KA, Petrick JL, London WT: Global epidemiology of hepatocellular carcinoma: an emphasis on demographic and regional variability. Clin Liver Dis 19 (2): 223-38, 2015.25921660
Leuridan E, Van Damme P: Hepatitis B and the need for a booster dose. Clin Infect Dis 53 (1): 68-75, 2011.21653306
Perrillo R: Benefits and risks of interferon therapy for hepatitis B. Hepatology 49 (5 Suppl): S103-11, 2009.19399806
Terrault NA, Lok ASF, McMahon BJ, et al.: Update on prevention, diagnosis, and treatment of chronic hepatitis B: AASLD 2018 hepatitis B guidance. Hepatology 67 (4): 1560-1599, 2018.29405329
Lai CL, Yuen MF: Prevention of hepatitis B virus-related hepatocellular carcinoma with antiviral therapy. Hepatology 57 (1): 399-408, 2013.22806323
Huang DQ, Li X, Le MH, et al.: Natural History and Hepatocellular Carcinoma Risk in Untreated Chronic Hepatitis B Patients With Indeterminate Phase. Clin Gastroenterol Hepatol 20 (8): 1803-1812.e5, 2022.33465482
Huang DQ, Tran A, Yeh ML, et al.: Antiviral therapy substantially reduces HCC risk in patients with chronic hepatitis B infection in the indeterminate phase. Hepatology 78 (5): 1558-1568, 2023.37184202
Singal AK, Salameh H, Kuo YF, et al.: Meta-analysis: the impact of oral anti-viral agents on the incidence of hepatocellular carcinoma in chronic hepatitis B. Aliment Pharmacol Ther 38 (2): 98-106, 2013.23713520
Coffin CS, Rezaeeaval M, Pang JX, et al.: The incidence of hepatocellular carcinoma is reduced in patients with chronic hepatitis B on long-term nucleos(t)ide analogue therapy. Aliment Pharmacol Ther 40 (11-12): 1262-9, 2014.25312649
Gordon SC, Lamerato LE, Rupp LB, et al.: Antiviral therapy for chronic hepatitis B virus infection and development of hepatocellular carcinoma in a US population. Clin Gastroenterol Hepatol 12 (5): 885-93, 2014.24107395
Chen JG, Egner PA, Ng D, et al.: Reduced aflatoxin exposure presages decline in liver cancer mortality in an endemic region of China. Cancer Prev Res (Phila) 6 (10): 1038-45, 2013.23963804

## Interventions with Inadequate Evidence of Decreased Risk of HCC

### HCV Treatment With DAAs

Treatment with direct-acting antivirals (DAAs) leads to elimination of hepatitis C virus (HCV) infection in almost all patients.[1] The goal of therapy is to eradicate HCV RNA and attain a sustained virologic response (SVR), which is defined as an undetectable RNA level 12 weeks after the completion of therapy. Attainment of an SVR is associated with a 97% to 100% chance of being HCV RNA negative during 5-year follow-up, and patients can therefore be considered cured of the HCV infection.[1]

Results from studies of hepatocellular cancer (HCC) risk after attaining SVR have produced conflicting results; some have observed increases in risk after treatment.[2] Most studies have included small numbers of patients, and some had insufficient follow-up time.[2] Some studies did not consider that the presence or absence of cirrhosis could affect the impact of DAAs on HCC risk.[3]

The strongest evidence to date regarding DAA treatment and HCC risk comes from a cohort study of more than 22,000 U.S. veterans receiving DAA treatment for HCV infection.[2] In that cohort, 271 HCC diagnoses occurred. Patients treated with DAAs who attained an SVR had an approximately 75% reduction in the HCC risk, relative to those who did not attain an SVR. Reduction relative risk with SVR was similar in patients with cirrhosis (hazard ratio [HR], 0.31; 95% CI, 0.23–0.44) and patients without cirrhosis (HR, 0.18; 95% CI, 0.11–0.30). Nevertheless, among patients who achieved an SVR, those with cirrhosis had an almost fivefold increase in HCC risk, relative to those without cirrhosis (HR, 4.73; 95% CI, 3.34–6.68).

### Statin Use Among Adults With HBV or HCV

Statins, also known as 3-hydroxy-3-methylglutaryl CoA (HMG-CoA) reductase inhibitors, are cholesterol-lowering medications. Statins have been implicated in the regulation of cell proliferation, apoptosis, and tumor progression in cancer patients, and statin use at the time of cancer diagnosis has been reported to be associated with reduced cancer risk and improved survival. A systematic review and meta-analysis noted that statin use was associated with lower cancer mortality and progression overall and in patients who initiated statin use after cancer diagnosis.[4] Another meta-analysis indicated that statin use may be associated with a 37% reduced risk of HCC (odds ratio [OR], 0.63; 95% CI, 0.52– 0.76).[5] However, this meta-analysis included a patient population with and without HBV/HCV infection, making the results difficult to interpret for HBV- or HCV-infected individuals.[6] In a U.K. study of 3,719 liver cancer cases and 14,876 controls, the authors observed a 35% lower risk (OR, 0.65; 95% CI, 0.58–0.74) of liver cancer among patients who received one or more statin prescriptions before a liver cancer diagnosis date for cases and corresponding date for matched controls after adjusting for factors including HBV infection, HCV infection, alcohol-related disorders, and diabetes mellitus.[7]

### Nonstatin Cholesterol-Lowering Medication Use Among Adults

Although several studies have shown that statin use lowers liver cancer risk, many patients are not able to tolerate statin therapy because of its side effects. It is unclear whether other cholesterol-lowering medications reduce the risk of liver cancer. Cholesterol-absorption inhibitors work in the small intestine to prevent cholesterol reabsorption and reduce the level of circulating cholesterol, which may regulate key signaling factors for angiogenesis and liver tumor growth. In the U.K.-based, nested case-control study, receiving one or more prescriptions for cholesterol-absorption inhibitors was associated with a lower risk of liver cancer overall (OR, 0.69; 95% CI, 0.50–0.95) and among patients with liver disease (OR, 0.53; 95% CI, 0.30–0.96).[7]

### References

Simmons B, Saleem J, Hill A, et al.: Risk of Late Relapse or Reinfection With Hepatitis C Virus After Achieving a Sustained Virological Response: A Systematic Review and Meta-analysis. Clin Infect Dis 62 (6): 683-694, 2016.26787172
Kanwal F, Kramer J, Asch SM, et al.: Risk of Hepatocellular Cancer in HCV Patients Treated With Direct-Acting Antiviral Agents. Gastroenterology 153 (4): 996-1005.e1, 2017.28642197
Buonomo AR, Gentile I, Borgia G: Direct acting antiviral agents and hepatocellular carcinoma development: don't take it for granted. Transl Gastroenterol Hepatol 2: 101, 2017.29264439
Mei Z, Liang M, Li L, et al.: Effects of statins on cancer mortality and progression: A systematic review and meta-analysis of 95 cohorts including 1,111,407 individuals. Int J Cancer 140 (5): 1068-1081, 2017.27859151
Singh S, Singh PP, Singh AG, et al.: Statins are associated with a reduced risk of hepatocellular cancer: a systematic review and meta-analysis. Gastroenterology 144 (2): 323-32, 2013.23063971
Li X, Sheng L, Liu L, et al.: Statin and the risk of hepatocellular carcinoma in patients with hepatitis B virus or hepatitis C virus infection: a meta-analysis. BMC Gastroenterol 20 (1): 98, 2020.32272891
Zamani SA, Graubard BI, Hyer M, et al.: Use of cholesterol-lowering medications in relation to risk of primary liver cancer in the Clinical Practice Research Datalink. Cancer 130 (20): 3506-3518, 2024.39072717

## Latest Updates to This Summary (04/30/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Incidence, Mortality, and Survival

Updated statistics with estimated new cases and deaths for 2025 (cited American Cancer Society as reference 2).

Updated statistics with estimated new cases and deaths worldwide in 2022 (cited Bray et al. as reference 4).

This summary is written and maintained by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about liver (hepatocellular) cancer prevention. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Screening and Prevention Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Liver (Hepatocellular) Cancer Prevention. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/liver/hp/liver-prevention-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389403]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).